# Spirituality in Cancer Care (PDQ®)

Patient Version

This PDQ cancer information summary has current information about religious and spiritual coping in cancer care. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## General Information About Spirituality

Key Points for This Section
- Religious and spiritual values are important to patients coping with cancer.
- Spirituality and religion may have different meanings.
- Serious illness, such as cancer, may cause spiritual distress.

### Religious and spiritual values are important to patients coping with cancer.

Studies have shown that religious and spiritual values are important to Americans. Most American adults say that they believe in God and that their religious beliefs affect how they live their lives. However, people have different ideas about life after death, belief in miracles, and other religious beliefs. Such beliefs may be based on sex, education, and ethnic background.

Many patients with cancer rely on spiritual or religious beliefs and practices to help them cope with their disease. This is called spiritual coping. Many caregivers also rely on spiritual coping. Each person may have different spiritual needs, depending on cultural and religious traditions. For some seriously ill patients, spiritual well-being may affect how much anxiety they feel about death. For others, it may affect what they decide about end-of-life treatments. Some patients and their family caregivers may want doctors to talk about spiritual concerns, but may feel unsure about how to bring up the subject.

Some studies show that doctors' support of spiritual well-being in very ill patients helps improve their quality of life. Health care providers who treat patients coping with cancer are looking at new ways to help them with religious and spiritual concerns. Doctors may ask patients which spiritual issues are important to them during treatment as well as near the end of life. When patients with advanced cancer receive spiritual support from the medical team, they may be more likely to choose hospice care and less aggressive treatment at the end of life.

### Spirituality and religion may have different meanings.

The terms spirituality and religion are often used in place of each other, but for many people they have different meanings. Religion may be defined as a specific set of beliefs and practices, usually within an organized group. Spirituality may be defined as an individual's sense of peace, purpose, and connection to others, and beliefs about the meaning of life. Spirituality may be found and expressed through an organized religion or in other ways. Patients may think of themselves as spiritual or religious or both.

### Serious illness, such as cancer, may cause spiritual distress.

Serious illnesses like cancer may cause patients or family caregivers to have doubts about their beliefs or religious values and cause much spiritual distress. Some studies show that patients with cancer may feel that they are being punished by God or may have a loss of faith after being diagnosed. Other patients may have mild feelings of spiritual distress when coping with cancer.

This summary is about spirituality and religion in adults with cancer.

## Spirituality and Quality of Life

Key Points for This Section
- Spiritual and religious well-being may help improve quality of life.
- Spiritual distress may also affect health.

### Spiritual and religious well-being may help improve quality of life.

It is not known for sure how spirituality and religion are related to health. Some studies show that spiritual or religious beliefs and practices create a positive mental attitude that may help a patient feel better and improve the well-being of family caregivers. Spiritual and religious well-being may help improve health and quality of life in the following ways:

- Decrease anxiety, depression, anger, and discomfort.
- Decrease the sense of isolation (feeling alone) and the risk of suicide.
- Decrease alcohol and drug abuse.
- Lower blood pressure and the risk of heart disease.
- Help the patient adjust to the effects of cancer and its treatment.
- Increase the ability to enjoy life during cancer treatment.
- Give a feeling of personal growth as a result of living with cancer.
- Increase positive feelings, including:
  - Hope and optimism.
  - Freedom from regret.
  - Satisfaction with life.
  - A sense of inner peace.

Spiritual and religious well-being may also help a patient live longer.

### Spiritual distress may also affect health.

Spiritual distress may make it harder for patients to cope with cancer and cancer treatment. Health care providers may encourage patients to meet with experienced spiritual or religious leaders to help deal with their spiritual issues. This may improve their health, quality of life, and ability to cope.

## Spiritual Assessment

Key Points for This Section
- A spiritual assessment may help the doctor understand how religious or spiritual beliefs will affect the way a patient copes with cancer.
- A spiritual assessment explores religious beliefs and spiritual practices.

### A spiritual assessment may help the doctor understand how religious or spiritual beliefs will affect the way a patient copes with cancer.

A spiritual assessment is a method or tool used by doctors to understand the role that religious and spiritual beliefs have in the patient's life. This may help the doctor understand how these beliefs affect the way the patient responds to the cancer diagnosis and decisions about cancer treatment. Some doctors or caregivers may wait for the patient to bring up spiritual concerns. Others may use an interview or a questionnaire.

### A spiritual assessment explores religious beliefs and spiritual practices.

A spiritual assessment may include questions about the following:

- Religious denomination, if any.
- Beliefs or philosophy of life.
- Important spiritual practices or rituals.
- Using spirituality or religion as a source of strength.
- Being part of a community of support.
- Using prayer or meditation.
- Loss of faith.
- Conflicts between spiritual or religious beliefs and cancer treatments.
- Ways that health care providers and caregivers may help with the patient's spiritual needs.
- Concerns about death and afterlife.
- Planning for the end of life.

The health care team may not ask about every issue the patient feels is important. Patients should bring up other spiritual or religious issues that they think may affect their cancer care.

## Meeting the Patient's Spiritual and Religious Needs

Key Points for This Section
- To help patients with spiritual needs during cancer care, medical staff will listen to the wishes of the patient.
- The health care team will help with a patient's spiritual needs when setting goals and planning treatment.

### To help patients with spiritual needs during cancer care, medical staff will listen to the wishes of the patient.

Spirituality and religion are very personal issues. Patients should expect doctors and caregivers to respect their religious and spiritual beliefs and concerns. Patients with cancer who rely on spirituality to cope with the disease should be able to count on the health care team to give them support. This may include giving patients information about people or groups that can help with spiritual or religious needs. Most hospitals have chaplains, but not all outpatient settings do. Patients who do not want to discuss spirituality during cancer care should also be able to count on the health care team to respect their wishes.

Doctors and caregivers will try to respond to their patients' concerns, but may not take part in patients' religious practices or discuss specific religious beliefs.

### The health care team will help with a patient's spiritual needs when setting goals and planning treatment.

The health care team may help with a patient's spiritual needs in the following ways:

- Suggest goals and options for care that honor the patient's spiritual and/or religious views.
- Support the patient's use of spiritual coping during the illness.
- Encourage the patient to speak with his/her religious or spiritual leader.
- Refer the patient to a hospital chaplain or support group that can help with spiritual issues during illness.
- Refer the patient to other therapies that have been shown to increase spiritual well-being. These include mindfulness relaxation, such as yoga or meditation, or creative arts programs, such as writing, drawing, or music therapy.

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Spirituality in Cancer Care

For more information from the National Cancer Institute about spirituality in cancer care, see the following:

- Your Faith and Spirituality (https://www.cancer.gov/about-cancer/coping/day-to-day/faith-and-spirituality)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about religious and spiritual coping in cancer care. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Spirituality in Cancer Care. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/day-to-day/faith-and-spirituality/spirituality-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389462]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).